# Osteosarcoma Treatment (PDQ®)

Patient Version

This PDQ cancer summary has current information about the treatment of osteosarcoma and undifferentiated pleomorphic sarcoma of bone. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Osteosarcoma and Undifferentiated Pleomorphic Sarcoma (UPS) of Bone

Key Points for This Section
- Osteosarcoma and undifferentiated pleomorphic sarcoma (UPS) of bone are diseases in which cancer cells form in bone.
- Having past treatment with chemotherapy or radiation can increase the risk of osteosarcoma.
- Symptoms of osteosarcoma and UPS include swelling over a bone or a bony part of the body and joint pain.
- Tests are used to diagnose osteosarcoma and UPS.
- After osteosarcoma or UPS has been diagnosed, imaging tests are done to find out if cancer cells have spread within the bone or to other parts of the body.
- You may want to get a second opinion.
- Certain factors may affect prognosis (chance of recovery) and treatment options.

### Osteosarcoma and undifferentiated pleomorphic sarcoma (UPS) of bone are diseases in which cancer cells form in bone.

Osteosarcoma is a rare type of bone cancer that starts in the cells called osteoblasts, which form new bone. In osteosarcoma, the cancer cells make osteoid, the early form of bone tissue. Osteosarcoma usually forms in the long bones of the arms and legs, and over half of the people with osteosarcoma have it in the long bones near the knee. While rare, it can also form in other bones or, in very unusual cases, in soft tissue or organs in the chest or abdomen.

This cancer is most common in adolescents and young adults. In the United States, about 440 cases of osteosarcoma are diagnosed each year in people 19 years and younger.

Undifferentiated pleomorphic sarcoma (UPS) is another rare cancer that can start in bones. UPS of the bone used to be called malignant fibrous histiocytoma. Under a microscope, UPS of the bone can look similar to osteosarcoma. However, UPS does not produce osteoid.

Osteosarcoma and UPS are treated the same way.

Ewing sarcoma is another kind of bone cancer. Learn more at Ewing Sarcoma Treatment.

### Having past treatment with chemotherapy or radiation can increase the risk of osteosarcoma.

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop osteosarcoma. And it will develop in some children who don't have a known risk factor. Risk factors for osteosarcoma include:

- past treatment with chemotherapy or radiation therapy
- having a certain change in the RB1 gene
- having certain conditions, such as:
  - Bloom syndrome
  - Diamond-Blackfan anemia
  - Li-Fraumeni syndrome
  - Paget disease
  - hereditary retinoblastoma
  - Rothmund-Thomson syndrome
  - Werner syndrome

Talk with your child's doctor if you think your child may be at risk.

### Symptoms of osteosarcoma and UPS include swelling over a bone or a bony part of the body and joint pain.

The symptoms of osteosarcoma and UPS depend on which bone it forms in. It's important to check with your child's doctor if your child has:

- swelling over a bone or bony part of the body
- pain in a bone or joint
- pain in the arm when lifting
- stiffness in a joint
- a limp or difficulty walking
- a bone that breaks for no known reason

These symptoms may be caused by osteosarcoma, UPS, or other problems. The only way to know is for your child to see a doctor.

### Tests are used to diagnose osteosarcoma and UPS.

If your child has symptoms that suggest bone cancer, the doctor will need to find out if they are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family health history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with osteosarcoma or UPS, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose osteosarcoma or UPS may include:

- X-ray is a type of radiation that can go through the body and onto film, making a picture of areas inside the body, such as the bones and organs.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Imaging tests are done before a biopsy.

- Biopsy removes a sample of tissue from the tumor so that a pathologist can view it under a microscope to check for cancer. It is important that the biopsy be done by a surgeon who is an expert in treating cancer of the bone. It is best if that surgeon is also the one who removes the tumor. The biopsy and the surgery to remove the tumor are planned together because the way the biopsy is done affects which type of surgery can be done later.
  The type of biopsy depends on the size of the tumor and where it is in the body. There are two types of biopsy that may be used:
  - Core biopsy uses a wide needle to remove a sample of tissue.
  - Incisional biopsy removes a sample of tissue through an incision in the skin.
  The following test may be done on the tissue that is removed:
  - Electron microscopy: A laboratory test in which cells in a sample of tissue are viewed under regular and high-powered microscopes to look for certain changes in the cells. An electron microscope shows tiny details better than other types of microscopes.

### After osteosarcoma or UPS has been diagnosed, imaging tests are done to find out if cancer cells have spread within the bone or to other parts of the body.

The process used to find out whether the cancer has spread within the bone or to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. It is important to know the stage in order to plan treatment.

The following imaging tests and procedures may be used to find out if osteosarcoma or UPS has spread:

- X-ray.
- CT scan (CAT scan).
- PET scan (positron emission tomography scan) uses a small amount of radioactive sugar (radioactive glucose) that is injected into a vein. The PET scanner rotates around the body and makes a picture of where sugar is being used in the body. Cancer cells show up brighter in the picture because they are more active and take up more sugar than normal cells do. This procedure is also called positron emission tomography (PET) scan.
- PET-CT scan combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time on the same machine. The pictures from both scans are combined to make a more detailed picture than either test would make by itself.
- MRI (magnetic resonance imaging).
- Bone scan checks if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.

### You may want to get a second opinion.

You may want to get a second opinion to confirm your child's cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Health Care Services (https://www.cancer.gov/about-cancer/managing-care/services). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors may affect prognosis (chance of recovery) and treatment options.

If your child has been diagnosed with osteosarcoma or UPS, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

Many factors affect prognosis and treatment options.

Factors that may affect your child's prognosis before treatment include:

- where the tumor is in the body and whether tumors formed in more than one bone
- whether multiple tumors have formed in the same bone
- the size of the tumor
- whether the cancer has spread to other parts of the body and, if so, where it has spread
- the type of tumor (based on how the cancer cells look under a microscope)
- your child's sex, age, and weight at the time of diagnosis
- whether your child has been treated for a different cancer in the past
- whether your child has certain genetic conditions

Factors that may affect your child's prognosis after treatment include:

- how well the chemotherapy worked
- whether the tumor was completely removed by surgery
- whether the cancer has recurred (come back) within 5 years of diagnosis

No two people are alike, and response to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

Treatment options for osteosarcoma and UPS depend on:

- where the tumor is in the body and if it has spread
- the size of the tumor
- the grade of the cancer
- whether the bones are still growing
- your child's age and overall health
- your child's and family's goals, such as being able to participate in sports, or concerns about physical appearance
- whether the cancer is newly diagnosed or has recurred after treatment

## Stages of Osteosarcoma and Undifferentiated Pleomorphic Sarcoma (UPS)

Key Points for This Section
- After osteosarcoma or undifferentiated pleomorphic sarcoma (UPS) has been diagnosed, tests are done to find out if cancer cells have spread to other parts of the body.
- Sometimes osteosarcoma and UPS of bone come back after treatment.

### After osteosarcoma or undifferentiated pleomorphic sarcoma (UPS) has been diagnosed, tests are done to find out if cancer cells have spread to other parts of the body.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It is important to know the stage of the osteosarcoma to plan the best treatment. Instead of being grouped by stage, osteosarcoma and UPS are grouped according to whether the cancer is localized or metastatic.

- Localized osteosarcoma or UPS has not spread out of the bone where the cancer started. There may be one or more areas of cancer in the bone that can be removed during surgery.
- Metastatic osteosarcoma or UPS has spread from the bone in which the cancer began to other parts of the body. The cancer most often spreads to the lungs. It may also spread to other bones.

### Sometimes osteosarcoma and UPS of bone come back after treatment.

The cancer may come back in the bone or in other parts of the body. Osteosarcoma and UPS most often recur in the lung, bone, or both. When osteosarcoma recurs, it is usually within 18 months after treatment is completed.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with osteosarcoma or undifferentiated pleomorphic sarcoma (UPS).
- Children with osteosarcoma or UPS should have their treatment planned by a team of health care providers who are experts in treating cancer in children.
- The following types of treatment are used:
  - Surgery
  - Chemotherapy
  - Radiation therapy
  - Samarium
- You may want to think about your child taking part in a clinical trial.
- Treatment for osteosarcoma or UPS may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for children with osteosarcoma or undifferentiated pleomorphic sarcoma (UPS).

You and your child's care team will work together to decide treatment. Many factors will be considered, such as where the cancer is located and your child's age and overall health.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Children with osteosarcoma or UPS should have their treatment planned by a team of health care providers who are experts in treating cancer in children.

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of osteosarcoma. The pediatric oncologist works with other health care providers who are experts in treating osteosarcoma and UPS and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- orthopedic surgeon who has experience treating bone tumors
- radiation oncologist
- rehabilitation specialist
- pediatric nurse specialist
- social worker
- child-life specialist
- psychologist
- fertility specialist

### The following types of treatment are used:

#### Surgery

Surgery to remove the entire tumor will be done when possible. Chemotherapy may be given before surgery to make the tumor smaller. This is called neoadjuvant chemotherapy. Chemotherapy is given so less bone tissue needs to be removed and there are fewer problems after surgery.

The following types of surgery may be done:

- Wide local excision removes the cancer and some healthy tissue around it.
- Limb-sparing surgery removes a tumor in an arm or leg without amputation. Limb-sparing surgery is often an option for children with osteosarcoma in an arm or leg. The tumor is removed by wide local excision. The removed tissue and bone may be replaced with a graft using tissue and bone taken from another part of the body, or with an implant such as artificial bone. If a fracture is found at the time of diagnosis or during chemotherapy before surgery, limb-sparing surgery may still be possible in some cases. If the surgeon is not able to remove all of the tumor and enough healthy tissue around it, an amputation may be done.
- Amputation removes part or all of an arm or leg. This may be done when it is not possible to remove all of the tumor in limb-sparing surgery. If prosthesis is part of the plan, fitting and training will take place with a prosthetist (a specialist in artificial limbs) over several weeks to months.
- Rotationplasty removes the tumor and the knee joint. The part of the leg that remains below the knee is then attached to the part of the leg that remains above the knee, with the foot facing backward and the ankle acting as a knee. A prosthesis may then be attached to the foot.

Studies have shown that survival is the same whether the first surgery done is a limb-sparing surgery or an amputation.

After the doctor removes all the cancer that can be seen at the time of the surgery, chemotherapy is given to kill any cancer cells that are left. Treatment given after the surgery to lower the risk that the cancer will come back is called adjuvant therapy.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment.

Chemotherapy for osteosarcoma and UPS is injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body. Chemotherapy is usually given before and after surgery to remove the tumor.

Chemotherapy drugs used alone or in combination to treat osteosarcoma include:

- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- docetaxel (https://www.cancer.gov/about-cancer/treatment/drugs/docetaxel)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
- ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Osteosarcoma is treated with external beam radiation therapy. This type of therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

Osteosarcoma and UPS cells are not killed easily by external radiation therapy. It may be used when a small amount of cancer is left after surgery, used together with other treatments, or used as palliative therapy to relieve symptoms caused by the tumor in the bone.

#### Samarium

Samarium is a radioactive drug that targets tumor cells in a bone. It helps relieve pain caused by cancer in the bone and it also kills blood cells in the bone marrow. It is used to treat osteosarcoma that has come back in a different bone after treatment.

Treatment with samarium may be followed by stem cell transplant. Before treatment with samarium, stem cells (immature blood cells) are removed from the child's blood or bone marrow and are frozen and stored. After treatment with samarium is complete, the stored stem cells are thawed and given back to the child through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

### You may want to think about your child taking part in a clinical trial.

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for osteosarcoma or UPS may cause side effects.

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems, such as infertility
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer), such as breast cancer or acute myeloid leukemia

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Treatment of Localized Osteosarcoma and Undifferentiated Pleomorphic Sarcoma (UPS) of Bone

Treatment of newly diagnosed localized osteosarcoma and UPS of bone may include:

- surgery to remove the tumor
- chemotherapy before or after surgery to remove the tumor
- radiation therapy if surgery cannot be done or if the tumor was not completely removed by surgery

Learn about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Metastatic Osteosarcoma and Undifferentiated Pleomorphic Sarcoma (UPS) of Bone

Lung Metastasis

When osteosarcoma or UPS spreads, it usually spreads to the lung. Treatment of newly diagnosed osteosarcoma and UPS that has spread to the lung may include chemotherapy followed by surgery to remove the primary cancer and more chemotherapy. Then, the doctor will remove the cancer in the lung and give additional chemotherapy.

Bone Metastasis or Bone with Lung Metastasis

Osteosarcoma and UPS may spread to a distant bone or to both the lung and a distant bone. Treatment of newly diagnosed osteosarcoma and UPS that has spread to a distant bone or to both the lung and a distant bone may include:

- Chemotherapy followed by surgery to remove the primary cancer. More chemotherapy is given after surgery. This may be followed by surgery to remove cancer that has spread to other areas of the body.
- Surgery to remove the primary cancer, followed by chemotherapy. Then the doctor will remove the cancer that has spread to other parts of the body and give combination chemotherapy.
- Surgery alone to remove cancer that has spread to a distant bone.
- Radiation therapy.

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Osteosarcoma and Undifferentiated Pleomorphic Sarcoma (UPS) of Bone

Treatment depends on where the cancer recurred and whether it has recurred more than once.

- For tumors that have recurred in the same bone where the cancer started, treatment is surgery.
- For tumors that have recurred in the lung only, treatment may include:
  - surgery to remove the tumor
  - chemotherapy
  - radiation therapy
- For tumors that have recurred in bones other than where the cancer started, treatment may include:
  - surgery to remove the tumor
  - chemotherapy
  - radiation therapy
  - samarium with or without stem cells, as palliative treatment to relieve pain and improve quality of life
- For tumors that have recurred twice, treatment may include:
  - surgery to remove the cancer and chemotherapy
  - chemotherapy alone

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Related resources

For more childhood cancer information and other general cancer resources, visit:

- Bone Cancer Home Page (https://www.cancer.gov/types/bone)
- Bone Cancer (https://www.cancer.gov/types/bone/bone-fact-sheet)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of osteosarcoma and undifferentiated pleomorphic sarcoma (UPS) (formerly called malignant fibrous histiocytoma [MFH]) of bone. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Osteosarcoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/bone/patient/osteosarcoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389380]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).